# Levels of evidence

Genetics (Prevention) Level of Evidence: 1ai: Randomized, controlled clinical trial with mortality as an endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 1aii: Randomized, controlled clinical trial with incidence as an endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 1b: Randomized, controlled clinical trial with a generally accepted intermediate endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 2ai: Nonrandomized, controlled clinical trial with mortality as an endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 2aii: Nonrandomized, controlled clinical trial with incidence as an endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 2b: Nonrandomized, controlled clinical trial with a generally accepted intermediate endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 3ai: Cohort or case-control studies, preferably from more than one center or research group with mortality as an endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 3aii: Cohort or case-control studies, preferably from more than one center or research group with incidence as an endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 3b: Cohort or case-control studies, preferably from more than one center or research group with a generally accepted intermediate endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 4ai: Ecologic (descriptive) studies with mortality as an endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 4aii: Ecologic (descriptive) studies with incidence as an endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 4b: Ecologic (descriptive) studies with a generally accepted intermediate endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Prevention) Level of Evidence: 5: Opinions of respected authorities based on clinical experience or reports of expert committees. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Screening) Level of Evidence: 1: Randomized controlled clinical trial. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Screening) Level of Evidence: 2: Nonrandomized controlled clinical trial. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Screening) Level of Evidence: 3: Cohort or case-control analytic studies, preferably from more than one center or research group. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Screening) Level of Evidence: 4: Multiple time series, with or without an intervention. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Screening) Level of Evidence: 5: Opinion of respected authorities based on clinical experience, descriptive studies, or reports of expert committees. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Treatment) Level of Evidence: 1: Randomized controlled clinical trial. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Treatment) Level of Evidence: 2: Nonrandomized controlled clinical trial. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Treatment) Level of Evidence: 3a: Cohort or case-control analytic studies with total mortality (or overall survival from a defined time) as an endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Treatment) Level of Evidence: 3b: Cohort or case-control analytic studies with cause-specific mortality (or cause-specific mortality from a defined time) as an endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Treatment) Level of Evidence: 3c: Cohort or case-control analytic studies with carefully assessed quality of life as an endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Treatment) Level of Evidence: 3di: Cohort or case-control analytic studies with disease-free survival as an indirect surrogate endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Treatment) Level of Evidence: 3dii: Cohort or case-control analytic studies with progression-free survival as an indirect surrogate endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Treatment) Level of Evidence: 3diii: Cohort or case-control analytic studies with tumor response rate as an indirect surrogate endpoint. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Treatment) Level of Evidence: 4: Ecologic, natural history, or descriptive studies. See Levels of Evidence for Cancer Genetics Studies for more information.
Genetics (Treatment) Level of Evidence: 5: Opinions of respected authorities based on clinical experience, descriptive studies, or reports of expert committees. See Levels of Evidence for Cancer Genetics Studies for more information.
Level of evidence 1A: Randomized, controlled clinical trial with total mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iA: Randomized, controlled, double-blinded clinical trial with total mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iB: Randomized, controlled, double-blinded clinical trial with cause-specific mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iC: Randomized, controlled, double-blinded clinical trial with carefully assessed quality of life as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iDi: Randomized, controlled, double-blinded clinical trial with event-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iDii: Randomized, controlled, double-blinded clinical trial with disease-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iDiii: Randomized, controlled, double-blinded clinical trial with progression-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iDiv: Randomized, controlled, double-blinded clinical trial with tumor response rate as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iiA: Randomized, controlled, nonblinded clinical trial with total mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iiB: Randomized, controlled, nonblinded clinical trial with cause-specific mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iiC: Randomized, controlled, nonblinded clinical trial with carefully assessed quality of life as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iiD: Randomized, controlled, nonblinded clinical trial with indirect surrogates as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iiDi: Randomized, controlled, nonblinded clinical trial with event-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iiDii: Randomized, controlled, nonblinded clinical trial with disease-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iiDiii: Randomized, controlled, nonblinded clinical trial with progression-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 1iiDiv: Randomized, controlled, nonblinded clinical trial with tumor response rate as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 2A: Nonrandomized, controlled clinical trial with total mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 2B: Nonrandomized, controlled clinical trial with cause-specific mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 2C: Nonrandomized, controlled clinical trial with carefully assessed quality of life as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 2Di: Nonrandomized, controlled clinical trial with event-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 2Dii: Nonrandomized, controlled clinical trial with disease-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 2Diii: Nonrandomized, controlled clinical trial with progression-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 2Div: Nonrandomized, controlled clinical trial with tumor response rate as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3i: Case series. Population-based, consecutive series. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iA: Population-based, consecutive case series with total mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iB: Population-based, consecutive case series with cause-specific mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iC: Population-based, consecutive case series with carefully assessed quality of life as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iDi: Population-based, consecutive case series with event-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iDii: Population-based, consecutive case series with disease-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iDiii: Population-based, consecutive case series with progression-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iDiv: Population-based, consecutive case series with tumor response rate as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3ii: Case series. Consecutive cases (not population-based).See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiA: Consecutive case series (not population-based) with total mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiB: Consecutive case series (not population-based) with cause-specific mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiC: Consecutive case series (not population-based) with carefully assessed quality of life as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiD: Consecutive case series (not population-based) with indirect surrogates as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiDi: Consecutive case series (not population-based) with event-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiDii: Consecutive case series (not population-based) with disease-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiDiii: Consecutive case series (not population-based) with progression-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiDiv: Consecutive case series (not population-based) with tumor response rate as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iii: Nonconsecutive case series. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiiA: Nonconsecutive case series with total mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiiB: Nonconsecutive case series with cause-specific mortality as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiiC: Nonconsecutive case series with carefully assessed quality of life as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiiD: Nonconsecutive case series with indirect surrogates as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiiDi: Nonconsecutive case series with event-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiiDii: Nonconsecutive case series with total disease-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiiDiii: Nonconsecutive case series with progression-free survival as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence 3iiiDiv: Nonconsecutive case series with tumor response rate as an endpoint. See Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies (PDQ®) for more information.
Level of evidence A1: Randomized controlled clinical trial (double-blinded or non-blinded) with an endpoint of overall survival from a defined time, total mortality, or cause-specific mortality.
Level of evidence A2: Meta-analysis of randomized controlled clinical trials with an endpoint of overall survival from a defined time, total mortality, or cause-specific mortality.
Level of evidence A3: Randomized controlled clinical trial (double-blinded or non-blinded) with an endpoint of quality of life that is well-collected, clinically meaningful, and carefully assessed.
Level of evidence B1: Randomized controlled clinical trial (double-blinded or non-blinded) with an endpoint of event-free survival, disease-free survival, or progression-free survival differences.
Level of evidence B2: Meta-analysis of randomized controlled clinical trials with an endpoint of event-free survival, disease-free survival, progression-free survival, or carefully assessed quality of life.
Level of evidence B3: Randomized controlled clinical trial (double-blinded or non-blinded) with an endpoint of tumor response rate or quality-of-life measurement that does not reach the level of evidence described in A3.
Level of evidence B4: Nonrandomized, multicentered, prospective, controlled clinical trial with a planned comparison of efficacy including an endpoint of overall survival from a defined time, total mortality, cause-specific mortality, carefully assessed quality of life, event-free survival, disease-free survival, progression-free survival, or tumor response differences.
Level of evidence C1: Case series or other observational study design including trials with nonconsecutive cases with an endpoint of overall survival from a defined time, total mortality, cause-specific mortality, or carefully assessed quality of life.
Level of evidence C2: Case series or other observational study design including trials with nonconsecutive cases with an endpoint of event-free survival, disease-free survival, or progression-free survival differences.
Level of evidence C3: Case series or other observational study design including trials with nonconsecutive cases with an endpoint of tumor response rate or quality-of-life measurement that does not reach the level of evidence described in A3.
Level of evidence D: Anecdotal experience or “expert” opinion.
Level of evidence I: Prospective, randomized, controlled trials and meta-analyses of prospective, randomized, controlled trials. See Levels of Evidence for Supportive and Palliative Care Studies (PDQ®) for more information.
Level of evidence II: Prospective, nonrandomized, controlled trials; prospective cohort studies; prospective case series; and cross-sectional studies. See Levels of Evidence for Supportive and Palliative Care Studies (PDQ®) for more information.
Level of evidence III: Retrospective studies. See Levels of Evidence for Supportive and Palliative Care Studies (PDQ®) for more information.
Level of evidence IV: Opinions of respected authorities based on clinical experience, consensus statements from expert committees, or authoritative reviews. See Levels of Evidence for Supportive and Palliative Care Studies (PDQ®) for more information.